# Topics in Integrative, Alternative, and Complementary Therapies (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the complementary and alternative therapies found in other PDQ summaries and NCI Fact Sheets. It is intended as a resource to inform and assist clinicians who care for cancer patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

This summary gives a brief description of some of the integrative, alternative, and complementary therapies used by people with cancer. Links to additional information, references, and resources on the NCI website are provided in this summary. This summary does not include all integrative, alternative, and complementary therapies.

Complementary and alternative medicine (CAM) covers a wide variety of therapies, botanicals, and dietary supplements. Complementary medicine is treatment that is used along with standard treatments but is not considered standard. Alternative medicine is treatment that is used instead of standard treatments. Less research has been done for most types of complementary and alternative medicine than for standard treatments. Integrative therapy is a total approach to medical care that combines standard care with CAM practices. The 2007 National Health Interview Survey reports that about four out of ten adults use a CAM therapy, with the most commonly used treatments being natural products and deep breathing exercises.[1]

One large survey of cancer survivors reported on the use of complementary therapies.[2] The therapies used most often were prayer and spiritual practice (61%), relaxation (44%), faith and spiritual healing (42%), and nutritional supplements and vitamins (40%). CAM therapies are used by 31% to 84% of children with cancer, both inside and outside of clinical trials.[3,4] CAM therapies have been used in the management of side effects caused by cancer or cancer treatment. Some cancer patients have chosen alternative medicine over conventional treatment, but with a greater risk of death.[5] In Asian countries, traditional Chinese medical therapies are frequently used along with conventional medicine.[6]

One study showed that when CAM was discussed in an oncology visit, it was most often brought up by the patient; and that having such discussions was associated with greater satisfaction with the visit by both patient and physician.[7]

This cancer information summary provides a brief description and a link to integrative, alternative, and complementary therapies found in PDQ summaries or NCI Fact Sheets. The links will take you to the specific PDQ summary, NCI Fact Sheet, or other PDQ summary section, providing more information and references on the topic. Refer to NCI's Office of Cancer Complementary and Alternative Medicine website (https://cam.cancer.gov/) for links to other resources.

### References

Barnes PM, Bloom B, Nahin RL: Complementary and alternative medicine use among adults and children: United States, 2007. Natl Health Stat Report (12): 1-23, 2009.19361005
Gansler T, Kaw C, Crammer C, et al.: A population-based study of prevalence of complementary methods use by cancer survivors: a report from the American Cancer Society's studies of cancer survivors. Cancer 113 (5): 1048-57, 2008.18680170
Kelly KM: Complementary and alternative medical therapies for children with cancer. Eur J Cancer 40 (14): 2041-6, 2004.15341976
Ndao DH, Ladas EJ, Bao Y, et al.: Use of complementary and alternative medicine among children, adolescent, and young adult cancer survivors: a survey study. J Pediatr Hematol Oncol 35 (4): 281-8, 2013.23612379
Johnson SB, Park HS, Gross CP, et al.: Use of Alternative Medicine for Cancer and Its Impact on Survival. J Natl Cancer Inst 110 (1): , 2018.28922780
Liu JM, Lin PH, Hsu RJ, et al.: Complementary traditional Chinese medicine therapy improves survival in patients with metastatic prostate cancer. Medicine (Baltimore) 95 (31): e4475, 2016.27495088
Roter DL, Yost KJ, O'Byrne T, et al.: Communication predictors and consequences of Complementary and Alternative Medicine (CAM) discussions in oncology visits. Patient Educ Couns 99 (9): 1519-25, 2016.27296081

## Acupuncture

Acupuncture is a part of traditional Chinese medicine practiced in China and Asia for thousands of years. It has been used clinically to manage cancer-related symptoms, treat side effects induced by chemotherapy or radiation therapy, boost blood cell count, and enhance lymphocyte and natural killer cell activity. In cancer treatment, the primary use of acupuncture is symptom management; commonly treated symptoms are cancer pain, chemotherapy-induced nausea and vomiting, and other symptoms that affect a patient’s quality of life, including weight loss, anxiety, depression, insomnia, poor appetite, and gastrointestinal symptoms (constipation and diarrhea). Refer to the PDQ summary on Acupuncture for more information.

## Botanicals/Herbal Products

### Black Cohosh

Black cohosh is a substance obtained from the root of a perennial herb used in some cultures to treat a number of medical problems. Black cohosh has been studied for reducing hot flashes. Clinical trials of black cohosh that have been well designed with a randomized placebo-controlled arm have also found that black cohosh is no better than a placebo in reducing hot flashes. Refer to the Herbs/dietary supplements section in the PDQ summary on Hot Flashes and Night Sweats for more clinical trial information about black cohosh.

### Cannabis and Cannabinoids (Also Known as Marijuana)

Cannabis originated in Central Asia but is grown worldwide today. In the United States, it is a controlled substance and is classified as a Schedule I agent (a drug with increased potential for abuse and no known medical use). The Cannabis plant produces a resin containing psychoactive compounds called cannabinoids. The potential benefits of medicinal Cannabis for people living with cancer include antiemetic effects, appetite stimulation, pain relief, and improved sleep. Refer to the PDQ summary on Cannabis and Cannabinoids for more information.

### Essiac/Flor Essence

Essiac and Flor Essence are herbal tea mixtures originally developed in Canada. They are marketed worldwide as dietary supplements. Proponents have claimed that Essiac and Flor Essence can help detoxify the body, strengthen the immune system, and fight cancer. No controlled data are available from human studies to suggest that Essiac or Flor Essence can be effective in the treatment of patients with cancer. Refer to the PDQ summary on Essiac/Flor Essence for more information.

### Flaxseed

Flaxseed comes from the seed of the flax plant and is a rich source of omega-3 fatty acid, fiber, and compounds called lignans. It is being studied in the prevention of several types of cancer. Flaxseed has also been studied for its effect on hot flashes. Refer to the Herbs/dietary supplements section in the PDQ summary on Hot Flashes and Night Sweats for information about clinical trials that have studied flaxseed.

### Ginger

The roots of the ginger plant have been used in cooking and by some cultures to treat nausea, vomiting, and certain other medical conditions. The plant has been studied for reducing nausea in cancer patients. Refer to the Ginger section in the PDQ summary on Treatment-Related Nausea and Vomiting for information about a randomized controlled trial of ginger in cancer patients.

### Ginseng

Ginseng, another popular supplement used to treat fatigue, was studied in patients with cancer who were either undergoing anticancer treatment or had completed treatment. There was a significant and clinically meaningful difference favoring the ginseng group over the placebo group. Refer to the Intervention section in the PDQ summary on Fatigue for more information.

### L-carnitine

L-carnitine is a dietary supplement believed to be helpful for the treatment of cancer-related fatigue because of its role in cellular energy metabolism and its ability to decrease proinflammatory cytokines. Refer to the Intervention section in the PDQ summary on Fatigue for information about a phase III study that compared L-carnitine with placebo.

### Marijuana

Refer to the PDQ summary on Cannabis and Cannabinoids for more information.

### Medicinal Mushrooms

Medicinal mushrooms have been used for hundreds of years, mainly in Asian countries, for the treatment of infections. More recently, medicinal mushrooms have also been used in the treatment of pulmonary diseases and cancer. Refer to the PDQ summary on Medicinal Mushrooms for more information.

### Milk Thistle

Milk thistle is a plant whose fruits have been used for more than 2,000 years as a treatment for liver and biliary disorders. The active substance in milk thistle is silymarin. Laboratory studies demonstrate that silymarin functions as an antioxidant, stabilizes cellular membranes, stimulates detoxification pathways, stimulates regeneration of liver tissue, inhibits the growth of certain cancer cell lines, exerts direct cytotoxic activity toward certain cancer cell lines, and may increase the efficacy of certain chemotherapy agents. Refer to the PDQ summary on Milk Thistle for more information.

### Mistletoe Extracts

Mistletoe is a semiparasitic plant that has been used for centuries to treat numerous human ailments. It is used commonly in Europe, where a variety of different extracts are manufactured and marketed as injectable prescription drugs. These injectable drugs are not available commercially in the United States and are not approved as a treatment for people with cancer. Refer to the PDQ summary on Mistletoe Extracts for more information.

### PC-SPES

PC-SPES is a patented mixture of eight herbs. Each herb used in PC-SPES has been reported to have anti-inflammatory, antioxidant, or anticarcinogenic properties. PC-SPES was recalled and withdrawn from the market because certain batches were contaminated with Food and Drug Administration–controlled prescription drugs. The manufacturer is no longer in operation, and PC-SPES is no longer being made. Refer to the PDQ summary on PC-SPES for more information.

### St. John’s wort

One popular herbal agent that has been used to treat depression is St. John's wort, a plant with Greek origins. The major active constituents in St. John's wort are hypothesized to be melatonin, hypericin, hyperforin, and adhyperforin, although hypericin may not reach sufficient concentrations in humans to have biologic activity. Hypericin is thought to be a monoamine oxidase inhibitor, while hyperforin and adhyperforin are believed to inhibit the reuptake of serotonin, dopamine, and norepinephrine.[1-3] These mechanisms of action provide the rationale for evaluating St. John's wort for depression management.

It is important that a physician knows what drugs a patient is already using before that patient begins taking St. John's wort, which decreases the effectiveness of other concomitantly administered drugs. There are two important cautions when the use of St. John's wort for depression is being considered:

1. As an herb, St. John's wort is regulated by the U.S. Food and Drug Administration (FDA) as a food/dietary supplement. Although the FDA issued a final rule establishing regulations to require manufacturers of dietary supplements to prove good manufacturing processes and to correctly label their ingredients,[4] the standardization of products such as St. John's wort with respect to the desired amount of potentially active ingredients is not required by the FDA, but nevertheless carried out by some manufacturers. Therefore, if hyperforin is the desired ingredient, the amount of hyperforin in any formulation of St. John's wort could differ substantially among brands.
2. St. John's wort is metabolized within the cytochrome P450 system and has effects inhibiting as well as inducing various metabolic enzymes. The enzymes affected by St. John's wort are CYP3A4, CYP2C9, and CYP2D6. In one study in humans, effects on systemic concentrations of drugs via the CYP3A4 pathway were evident in as few as 14 days.[5] Clinically, this means that the concomitant use of St. John's wort with other drugs could cause lower concentrations of drugs that are needed to have therapeutic effects. With respect to cancer and its treatment, St. John's wort has been shown to decrease concentrations of irinotecan in patients receiving treatment [6] and, in vitro, is suspected of reducing concentrations of docetaxel.[7] Additionally, St. John's wort has been found to affect concentrations of cyclosporin A and tacrolimus, both important for transplant engraftment,[8] as well as concentrations of indinavir for the treatment of the human immunodeficiency virus.

Trials have compared St. John’s wort with placebo, with antidepressants, and sometimes with both placebo and antidepressants. A wide range of results have emerged, from finding no differences between arms, to finding St. John's wort improving outcomes over placebo for moderate depression, to finding St. John's wort preferable to placebo in general, to finding St. John's wort equal to antidepressants in alleviating depressive symptoms.[5];[9,10][Level of evidence: I] Older studies comparing St. John's wort with antidepressant therapy tended to use low doses of antidepressants, and the doses of antidepressants did not titrate up by response to the usual doses used for managing depression. The best overview of the research in this area is provided in a meta-analysis of randomized controlled trials.[10] Conclusions from this meta-analysis, which includes 37 trials, are that St. John's wort does not have a clinically important effect on major depressive disorder and that for milder depression, it may have some effect (but the effect is not large).

Side effects reported in studies of St. John's wort are minimal. One study that compared St. John's wort with sertraline and placebo found that the side effects of St. John's wort, which were significantly different from those of placebo, included anorgasmia, frequent urination, and swelling.[11][Level of evidence: I] According to a meta-analysis of randomized controlled trials, fewer patients treated with St. John's wort withdrew from trials because of adverse effects than did those treated with antidepressants.[10]

The bottom line regarding the use of St. John's wort for the management of depression is that, despite a more tolerable side effect profile, there is some, but currently no unambiguous evidence demonstrating an advantage to using this herbal agent over approved antidepressant therapy. The data do not support a strong effect on major depressive disorder or even on mild to moderate depression. This fact, combined with concerns about drug interactions and lack of uniformity in standardization, limits the evidence which supports St. John's wort as being effective for depression management specifically in cancer patients.

### Selected Vegetables/Sun's Soup

“Selected Vegetables” and “Sun’s Soup” are names given to several different mixtures of vegetables and herbs that have been studied as treatments for cancer. These mixtures were developed by a single individual. Two formulations of Selected Vegetables/Sun’s Soup are marketed in the United States as dietary supplements. The vegetables and herbs in Selected Vegetables/Sun’s Soup are thought to have anticancer and/or immune-system–stimulating properties. Existing data supporting the effectiveness of Selected Vegetables/Sun’s Soup as a treatment for cancer are limited and weak. Refer to the PDQ summary on Selected Vegetables/Sun’s Soup for more information.

### References

Memorial Sloan-Kettering Cancer Center Integrative Medicine Service: About Herbs, Botanicals & Other Products: St. John’s Wort. New York, NY: Memorial Sloan-Kettering Cancer Center, 2014. Available online (https://www.mskcc.org/cancer-care/integrative-medicine/herbs/st-john-wort). Last accessed October 26, 2017.
National Center for Complementary and Integrative Health: Get the Facts: St. John's Wort and Depression. Bethesda, Md: National Institutes of Health, 2013. NCCIH Pub. No. D005. Also available online (https://nccih.nih.gov/health/stjohnswort/sjw-and-depression.htm). Last accessed October 26, 2017.
Franklin M, Cowen PJ: Researching the antidepressant actions of Hypericum perforatum (St. John's wort) in animals and man. Pharmacopsychiatry 34 (Suppl 1): S29-37, 2001.11518072
U.S. Food and Drug Administration: FDA Issues Dietary Supplements Final Rule. Silver Spring, Md: U.S. Food and Drug Administration, 2007. Available online (https://www.fda.gov/Food/GuidanceRegulation/CGMP/ucm110858.htm). Last accessed October 26, 2017.
Markowitz JS, Donovan JL, DeVane CL, et al.: Effect of St John's wort on drug metabolism by induction of cytochrome P450 3A4 enzyme. JAMA 290 (11): 1500-4, 2003.13129991
Mathijssen RH, Verweij J, de Bruijn P, et al.: Effects of St. John's wort on irinotecan metabolism. J Natl Cancer Inst 94 (16): 1247-9, 2002.12189228
Komoroski BJ, Parise RA, Egorin MJ, et al.: Effect of the St. John's wort constituent hyperforin on docetaxel metabolism by human hepatocyte cultures. Clin Cancer Res 11 (19 Pt 1): 6972-9, 2005.16203790
Mansky PJ, Straus SE: St. John's Wort: more implications for cancer patients. J Natl Cancer Inst 94 (16): 1187-8, 2002.12189216
Mannel M, Kuhn U, Schmidt U, et al.: St. John's wort extract LI160 for the treatment of depression with atypical features - a double-blind, randomized, and placebo-controlled trial. J Psychiatr Res 44 (12): 760-7, 2010.20181361
Linde K, Berner M, Egger M, et al.: St John's wort for depression: meta-analysis of randomised controlled trials. Br J Psychiatry 186: 99-107, 2005.15684231
Hypericum Depression Trial Study Group: Effect of Hypericum perforatum (St John's wort) in major depressive disorder: a randomized controlled trial. JAMA 287 (14): 1807-14, 2002.11939866

## Mind-Body Therapies and Massage

### Aromatherapy With Essential Oils

Aromatherapy is the therapeutic use of essential oils (also known as volatile oils) from plants (flowers, herbs, or trees) for the improvement of physical, emotional, and spiritual well-being. Aromatherapy is used by cancer patients primarily as supportive care for general well-being, and with other complementary treatments (e.g., massage and acupuncture) and standard treatment. Refer to the PDQ summary on Aromatherapy With Essential Oils for more information.

### Cognitive-Behavioral Therapy (CBT)

CBT is a type of psychotherapy that helps patients change behavior by changing the way they think and feel about certain things. It is used to treat mental, emotional, personality, and behavioral disorders.

The efficacy of CBT has been studied for insomnia. Refer to the Nonpharmacologic Management of Sleep Disturbances section in the PDQ summary on Sleep Disorders for more information about cognitive behavioral interventions used for insomnia.

Relaxation therapy and imagery have been used to treat anticipatory nausea and vomiting. Refer to the Treatment of Anticipatory Nausea and Vomiting section in the PDQ summary on Treatment-Related Nausea and Vomiting for more information about behavioral interventions used in the treatment of anticipatory nausea and vomiting.

Cognitive-behavioral psychotherapy has been used to treat depression and has been offered in a variety of forms. Most interventions have been offered in both individual and small-group formats and have included a structured educational component about cancer or a specific relaxation component. Refer to the Psychotherapy section in the PDQ summary on Depression for more information about psychotherapy for depression. Refer to the Treatment section in the PDQ summary on Cancer-Related Post-traumatic Stress for more information about the use of CBT for post-traumatic symptoms.

### Hypnosis

Hypnosis is a trance-like state in which one becomes more aware and focused and is more open to suggestion. Under hypnosis, a person can concentrate more clearly on a specific thought, feeling, or sensation without becoming distracted. Refer to the Psychosocial Interventions for Distress section in the PDQ summary on Adjustment to Cancer: Anxiety and Distress for information on a study about hypnosis used for presurgical distress.

### Qigong

Qigong is a component of traditional Chinese medicine that combines movement, meditation, and controlled breathing. The intent is to improve blood flow and the flow of qi. Some trials, mostly with small sample sizes, have indicated that qigong may improve quality of life and fatigue in cancer patients.[1] Refer to the Exercise section in the PDQ summary on Fatigue for more information about how qigong is being studied in cancer-related fatigue.

### Spirituality

Spirituality and religion are important to most individuals in the general population, according to national surveys. In health care, concerns about spiritual or religious well-being have sometimes been viewed as an aspect of complementary and alternative medicine, but this perception may be more characteristic of providers than of patients. Refer to the PDQ summary on Spirituality in Cancer Care for information about religion, spirituality, spiritual well-being, and health.

### Tai Chi

Some trials, mostly with small sample sizes, have indicated that tai chi may improve quality of life and fatigue in cancer patients.[1] A study that compared CBT with a manualized form of Tai Chi (Tai Chi Chih) for the treatment of insomnia in 90 breast cancer survivors found improvements in insomnia in both groups and no significant difference between the two therapies.[2] Refer to the PDQ summary on Cognitive Impairment in Adults with Non−Central Nervous System Cancers for more information about how Tai Chi is being studied in cognitive impairment.

### Yoga

Yoga is an ancient system of practices used to balance the mind and body through movement, meditation (focusing thoughts), and control of breathing and emotions. Yoga is being studied as a way to relieve stress and poor sleep in cancer patients.[3] One study revealed lower levels of fatigue and inflammation in breast cancer survivors participating in a yoga program.[4] Refer to the Mindfulness-based therapy section in the PDQ summary on Adjustment to Cancer: Anxiety and Distress for information about a clinical trial that used meditation and yoga to reduce stress in breast cancer survivors.

### References

Zeng Y, Luo T, Xie H, et al.: Health benefits of qigong or tai chi for cancer patients: a systematic review and meta-analyses. Complement Ther Med 22 (1): 173-86, 2014.24559833
Irwin MR, Olmstead R, Carrillo C, et al.: Tai Chi Chih Compared With Cognitive Behavioral Therapy for the Treatment of Insomnia in Survivors of Breast Cancer: A Randomized, Partially Blinded, Noninferiority Trial. J Clin Oncol 35 (23): 2656-2665, 2017.28489508
Pan Y, Yang K, Wang Y, et al.: Could yoga practice improve treatment-related side effects and quality of life for women with breast cancer? A systematic review and meta-analysis. Asia Pac J Clin Oncol 13 (2): e79-e95, 2017.25560636
Kiecolt-Glaser JK, Bennett JM, Andridge R, et al.: Yoga's impact on inflammation, mood, and fatigue in breast cancer survivors: a randomized controlled trial. J Clin Oncol 32 (10): 1040-9, 2014.24470004

## Nutritional Therapies

### Antioxidants and Cancer Prevention

Antioxidants are substances that may protect cells from the damage caused by unstable molecules known as free radicals. Free radical damage may lead to cancer. Antioxidants interact with and stabilize free radicals and may prevent some of the damage free radicals might otherwise cause. There has been some concern about whether antioxidants may decrease the effectiveness of chemotherapy and radiation therapy. Examples of antioxidants include beta-carotene; lycopene; vitamins C, E, and A; and other substances. Refer to the NCI Fact Sheet on Antioxidants and Cancer Prevention (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/antioxidants-fact-sheet) for more information about antioxidants.

### Coenzyme Q10

Coenzyme Q10 is made naturally by the human body. Coenzyme Q10 helps cells to produce energy, and it acts as an antioxidant. Coenzyme Q10 has shown an ability to stimulate the immune system and to protect the heart from damage caused by certain chemotherapy drugs. No report of a randomized clinical trial of coenzyme Q10 as a treatment for cancer has been published in a peer-reviewed scientific journal. Refer to the PDQ summary on Coenzyme Q10 for more information.

### Dietary Supplements

Many studies suggest that the use of complementary and alternative medicine is common among many cancer patients, and the use of vitamins, supplements, and specific foods is frequently reported by prostate cancer patients. Refer to the PDQ summary on Prostate Cancer, Nutrition, and Dietary Supplements for information about green tea, lycopene, modified citrus pectin (MCP), pomegranate, soy, and Zyflamend supplements used by some prostate cancer patients.

### Gerson Therapy

The Gerson therapy is advocated by its supporters as a method of treating cancer patients based on changes in diet and nutrient intake. An organic vegetarian diet plus nutritional and biological supplements, pancreatic enzymes, and coffee or other types of enemas are the main features of the Gerson therapy. Few clinical studies of the Gerson therapy are found in the medical literature. Refer to the PDQ summary on the Gerson Therapy for more information.

### Glutamine

Glutamine is an amino acid that is important for gastrointestinal (GI) mucosal cells and their replication. These cells are often damaged by chemotherapy and radiation therapy, causing mucositis and diarrhea, which can lead to treatment delays, dose reductions, and severely affect quality of life. Some evidence suggests that oral glutamine can reduce both of those toxicities by aiding in faster healing of the mucosal cells and the entire GI tract. Refer to the Nutrition Trends in Cancer section in the PDQ summary on Nutrition in Cancer Care for information on trials that studied oral glutamine.

### Gonzalez Regimen

The Gonzalez regimen is a complex cancer treatment that is tailored by the practitioner for each specific patient and is currently available only to the patients of its developer. Pancreatic enzymes taken orally are the primary agents in the regimen thought to have direct antitumor effects. The regimen also includes specific diets, vitamin and mineral supplements, extracts of animal organs, and coffee enemas. Refer to the PDQ summary on the Gonzalez Regimen for more information.

### Lycopene

Lycopene is a carotenoid found in a number of fruits and vegetables, including apricots, guava, and watermelon, but most of the lycopene consumed in the United States comes from tomato-based products. When ingested, lycopene is broken down into a number of metabolites and is thought to have various biological functions, including antioxidant capabilities. Lycopene has been investigated for its role in chronic diseases, including cardiovascular disease and cancer. Refer to the Lycopene section in the PDQ summary on Prostate Cancer, Nutrition, and Dietary Supplements for more information.

### Melatonin

Melatonin is a hormone produced by the pineal gland during the hours of darkness, plays a major role in the sleep-wake cycle, and is linked to the circadian rhythm. Clinical studies in renal, breast, colon, lung, and brain cancer suggest that melatonin exerts anticancer effects in conjunction with chemotherapy and radiation therapy; however, evidence remains inconclusive. Refer to the Botanical/dietary supplements section in the PDQ summary on Sleep Disorders for information about how melatonin is being studied in sleep disturbances. Refer to the Nutrition Trends in Cancer section in the PDQ summary on Nutrition in Cancer Care for information on how melatonin is being studied with chemotherapy or radiation therapy.

### Modified Citrus Pectin (MCP)

Citrus pectin is a complex polysaccharide found in the peel and pulp of citrus fruit and can be modified by treatment with high pH and temperature. MCP may have effects on cancer growth and metastasis through multiple potential mechanisms, as suggested in preclinical research. Some research suggests that MCP may be protective against various types of cancer, including colon, lung, and prostate cancer. Refer to the Modified Citrus Pectin section in the PDQ summary on Prostate Cancer, Nutrition, and Dietary Supplements for more information.

### Pomegranate

The pomegranate (Punica granatum L.) plant is native to Asia and cultivated widely throughout the world. Various components of the pomegranate fruit contain bioactive compounds, including phenolics, flavonoids, and anthocyanins, some of which have antioxidant activity. Pomegranate extracts have been shown to inhibit the proliferation of human prostate cancer cells in vitro. Refer to the Pomegranate section in the PDQ summary on Prostate Cancer, Nutrition, and Dietary Supplements for more information.

### Probiotics

Probiotics are nutritional supplements that contain a defined amount of viable microorganisms. The use of probiotic functional foods (beneficial live microorganisms) to modify gut microflora has been suggested for clinical conditions associated with diarrhea, gut-barrier dysfunction, and inflammatory response. Refer to the Management section in the PDQ summary on Gastrointestinal Complications for information about probiotics. Refer to the Nutrition Trends in Cancer section in the PDQ summary on Nutrition in Cancer Care for information on trials that used probiotics before radiation therapy.

### Selenium

Selenium is an essential trace mineral involved in a number of biological processes, including enzyme regulation, gene expression, and immune function. Selenium is being studied for its role in cancer. Refer to the Selenium section in the PDQ summary on Prostate Cancer, Nutrition, and Dietary Supplements for information about studies investigating the effects of selenium on prostate cancer.

### Soy

Soy comes from a plant of Asian origin that produces beans used in many food products. Soy foods (e.g., soy milk, miso, tofu, and soy flour) contain phytochemicals that may have health benefits and, among these, soy isoflavones have been the focus of most of the research. Soy is being studied for the prevention of cancer, hot flashes that occur with menopause, and osteoporosis (loss of bone density). Refer to the Integrative Approaches section in the PDQ summary on Hot Flashes and Night Sweats for information about the use of soy in breast cancer patients. Refer to the Soy section in the PDQ summary on Prostate Cancer, Nutrition, and Dietary Supplements for information about studies investigating the effects of soy on prostate cancer.

### Tea

Tea has long been regarded as an aid to good health, and many believe it can help reduce the risk of cancer. Tea originates from the plant Camellia sinensis, and contains polyphenol compounds, particularly catechins, which are antioxidants and whose biological activities may be relevant to cancer prevention. Refer to the NCI Fact Sheet on Tea and Cancer Prevention: Strengths and Limits of the Evidence (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/tea-fact-sheet) for information about tea and cancer prevention.

Some observational and interventional studies suggest that green tea may have a protective effect against cardiovascular disease, and there is evidence that green tea may protect against various forms of cancer. Refer to the Green Tea section in the PDQ summary on Prostate Cancer, Nutrition, and Dietary Supplements for more information about studies investigating the effects of green tea on prostate cancer.

### Vitamin C, High-Dose

Vitamin C (ascorbic acid) is an essential nutrient that has antioxidant functions, is a cofactor for several enzymes, and plays an important role in the synthesis of collagen. High-dose vitamin C has been studied as a treatment for cancer patients. Refer to the PDQ summary on High-Dose Vitamin C for more information.

### Vitamin D

Vitamin D is involved in a number of processes that are essential for good health. Vitamin D is produced by the body in response to sunlight exposure. It can also be obtained through the diet, but very few foods naturally contain vitamin D. These foods include fatty fish, fish liver oil, and eggs. Refer to the NCI Fact Sheet on Vitamin D and Cancer Prevention (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/vitamin-d-fact-sheet) for information about scientific studies that have investigated the possible role of vitamin D in cancer prevention. Refer to the Vitamin D section in the PDQ summary on Prostate Cancer, Nutrition, and Dietary Supplements for information about studies investigating the effects of vitamin D on prostate cancer.

### Vitamin E

Vitamin E is a nutrient that the body needs in small amounts to stay healthy and work the way it should. It is fat-soluble (can dissolve in fats and oils) and is found in seeds, nuts, leafy green vegetables, and vegetable oils. Vitamin E boosts the immune system and helps keep blood clots from forming. It also helps prevent cell damage caused by free radicals (highly reactive chemicals). Vitamin E is being studied in the prevention and treatment of some types of cancer. It is a type of antioxidant, also called alpha-tocopherol. Refer to the Vitamin E section in the PDQ summary on Prostate Cancer, Nutrition, and Dietary Supplements for information about studies investigating the effects of vitamin E on prostate cancer. Refer to the Herbs/dietary supplements section in the PDQ summary on Hot Flashes and Night Sweats for information about hot flashes and vitamin E studies.

## Pharmacologic Treatments

### 714-X

714-X is naturally derived camphor that is chemically modified by the introduction of a nitrogen atom. It is claimed that 714-X protects and stabilizes the immune system and restores its ability to fight cancer. No study of 714-X has been published in a peer-reviewed scientific journal to show its safety or effectiveness in treating cancer. Refer to the PDQ summary on 714-X for more information.

### Antineoplastons

Antineoplastons are drugs composed of chemical compounds that are naturally present in the urine and blood. They are an experimental cancer therapy that is purported to provide a natural biochemical substance that is excreted and therefore lacking in people with cancer. Antineoplastons therapy for cancer patients is currently available only in the United States and only to the patients of its developer. Refer to the PDQ summary on Antineoplastons for more information.

### Cancell/Cantron/Protocel

Cancell/Cantron/Protocel—also known by the names Sheridan’s Formula, Jim’s Juice, JS-114, JS-101, 126-F, and the "Cancell-like" products Cantron and Protocel—is a liquid that has been produced in various forms principally by two manufacturers since the late 1930s. The exact composition of Cancell/Cantron/Protocel is unknown and not effective in treating any type of cancer. Refer to the PDQ summary on Cancell/Cantron/Protocel for more information.

### Cartilage (Bovine and Shark)

Bovine (cow) cartilage and shark cartilage have been studied as treatments for people with cancer and other medical conditions for more than 30 years. At least three different inhibitors of angiogenesis have been identified in bovine cartilage, and two angiogenesis inhibitors have been purified from shark cartilage. Refer to the PDQ summary on Cartilage (Bovine and Shark) for more information.

### Hydrazine Sulfate

Hydrazine sulfate is a chemical that has been studied as a treatment for cancer and as a treatment for the body wasting (i.e., cachexia) associated with this disease. It has been claimed that hydrazine sulfate limits the ability of tumors to obtain glucose, which is a type of sugar used by cells to create energy. Refer to the PDQ summary on Hydrazine Sulfate for more information.

### Laetrile/Amygdalin

Laetrile is another name for the chemical amygdalin, which is found in the pits of many fruits and in numerous plants. Cyanide is thought to be the main anticancer component of laetrile. Laetrile has shown little anticancer activity in animal studies and no anticancer activity in human clinical trials. Refer to the PDQ summary on Laetrile/Amygdalin for more information.

### Newcastle Disease Virus (NDV)

NDV is a paramyxovirus that causes Newcastle disease in a wide variety of birds (most notably, in chickens). Although NDV causes a potentially fatal, noncancerous disease (Newcastle disease) in birds, it causes only minor illness in humans. NDV appears to replicate (i.e., reproduce) substantially better in human cancer cells than it does in most normal human cells. Refer to the PDQ summary on Newcastle Disease Virus for more information.

## Changes to This Summary (11/02/2018)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Mind-Body Therapies and Massage

The Aromatherapy With Essential Oils subsection was renamed from Aromatherapy and Essential Oils.

This summary is written and maintained by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® - NCI's Comprehensive Cancer Database (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the complementary and alternative therapies found in other PDQ summaries and NCI Fact Sheets. It is intended as a resource to inform and assist clinicians who care for cancer patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Topics in Integrative, Alternative, and Complementary Therapies are:

- Jinhui Dou, PhD (Yiling Pharmaceutical, Inc.)
- Jing Li, PhD (Food and Drug Administration)
- Gabriel Lopez, MD (MD Anderson Cancer Center)
- Weidong Lu, MB, PhD, MPH (Dana-Farber Cancer Institute)
- Jeffrey D. White, MD (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Integrative, Alternative, and Complementary Therapies Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Topics in Integrative, Alternative, and Complementary Therapies. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/hp/cam-topics-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389506]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).